# Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention (PDQ®)

Patient Version

This PDQ cancer information summary has current information about oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What is prevention?

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

To prevent new cancers from starting, scientists look at risk factors and protective factors. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Regular exercise and a healthy diet may be protective factors for some types of cancer. Avoiding risk factors and increasing protective factors may lower your risk but it does not mean that you will not get cancer.

Different ways to prevent cancer are being studied, including:

- Changing lifestyle or eating habits.
- Avoiding things known to cause cancer.
- Taking medicines to treat a precancerous condition or to keep cancer from starting.

For information about screening, diagnosis, and treatment of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancer, see the following:

- Oral Cavity and Nasopharyngeal Cancers Screening
- Lip and Oral Cavity Cancer Treatment
- Oropharyngeal Cancer Treatment
- Cigarette Smoking: Health Risks and How to Quit
- Laryngeal Cancer Treatment
- Hypopharyngeal Cancer Treatment

## General Information About Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers

Oral cavity, pharyngeal, and laryngeal cancers usually form in the squamous cells (thin, flat cells lining the inside of the oral cavity, pharynx, and larynx).

Oral cavity cancer forms in any of these tissues of the oral cavity:

- The lips.
- The front two thirds of the tongue.
- The gingiva (gums).
- The buccal mucosa (the lining of the inside of the cheeks).
- The floor (bottom) of the mouth under the tongue.
- The hard palate (the front, bony part of the roof of the mouth).
- The retromolar trigone (the small area behind the wisdom teeth).

Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.

Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.

Pharyngeal cancer forms in any of these tissues of the pharynx (throat):

- The nasopharynx (the upper part of the throat behind the nose).
- The oropharynx, which includes the following tissues:
  - The middle part of the throat behind the mouth.
  - The back one third of the tongue.
  - The soft palate (the back of the roof of the mouth), including the uvula.
  - The side and back walls of the throat.
  - The tonsils.
- The hypopharynx (the bottom part of the throat).

Cancers of the nasopharynx have causes, screening, risk factors, and treatment approaches which are distinct from other cancers of the pharynx. For more information, see Nasopharyngeal Cancer Treatment and Oral Cavity and Nasopharyngeal Cancers Screening.

Anatomy of the pharynx. The pharynx is a hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. The three parts of the pharynx are the nasopharynx, oropharynx, and hypopharynx.

Anatomy of the pharynx; drawing shows the nasopharynx, oropharynx, and hypopharynx. Also shown are the nasal cavity, oral cavity, hyoid bone, larynx, esophagus, and trachea.

Laryngeal cancer forms in any of these tissues of the larynx (voice box):

- The supraglottis (the area above the vocal cords, including the epiglottis).
- The vocal cords (two small bands of muscle within the larynx that vibrate to produce the voice).
- The glottis (the middle part of the larynx, including the vocal cords).
- The subglottis (the lowest part of the larynx, from just below the vocal cords to the top of the trachea).

Anatomy of the larynx. The three parts of the larynx are the supraglottis (including the epiglottis), the glottis (including the vocal cords), and the subglottis.

Anatomy of the larynx; drawing shows the epiglottis, supraglottis, glottis, subglottis, and vocal cords. Also shown are the tongue, trachea, and esophagus.

Oral cavity cancer and oropharyngeal cancer: Men are more than twice as likely as women to have oral cavity cancer or oropharyngeal cancer and die from it.

Hypopharyngeal cancer: Hypopharyngeal cancer is rare. The number of new cases of hypopharyngeal cancer has slightly decreased over the past twenty years. The decrease in new cases is likely because of a decrease in cigarette smoking.

Nasopharyngeal cancer: Nasopharyngeal cancer is rare in the United States. It is more common in parts of Asia, the Arctic region, North Africa, and the Middle East.

Laryngeal cancer: Laryngeal cancer is less common than oral cavity and oropharyngeal cancers. The number of new cases of laryngeal cancer has slightly decreased over the past ten years. The decrease in new cases is likely because of a decrease in cigarette smoking.

## Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention

Key Points for This Section
- Avoiding risk factors and increasing protective factors may help prevent cancer.
- The following are risk factors for oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers:
  - Tobacco use
  - Alcohol use
  - Tobacco and alcohol use
  - Betel quid chewing
  - Personal history of head and neck cancer
- The following is a risk factor for oral cavity cancer and oropharyngeal cancer:
- The following is a protective factor for oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers:
- It is not clear whether avoiding certain risk factors will decrease the risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers.
- Cancer prevention clinical trials are used to study ways to prevent cancer.
- New ways to prevent oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers are being studied in clinical trials.

### Avoiding risk factors and increasing protective factors may help prevent cancer.

Avoiding cancer risk factors may help prevent certain cancers. Risk factors include smoking, having overweight, and not getting enough exercise. Increasing protective factors such as quitting smoking and exercising may also help prevent some cancers. Talk to your doctor or other health care professional about how you might lower your risk of cancer.

Oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers have common risk factors.

### The following are risk factors for oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers:

#### Tobacco use

Using tobacco is the most common cause of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers. The risk of these cancers is about 5 to 10 times higher for current smokers than for people who have never smoked, and is linked to how much and how long the person has smoked.

The use of all types of tobacco, including cigarettes, pipes, cigars, and smokeless tobacco (snuff and chewing tobacco) can cause cancers of the oral cavity, oropharynx, hypopharynx, and larynx.

#### Alcohol use

Using alcohol is also an important risk factor for oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers.

The risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers increases with the number of alcoholic drinks consumed per day. The risk of these cancers is 2 to 6 times higher in people who have 2 or more alcoholic drinks per day compared with those who don't drink alcohol.

#### Tobacco and alcohol use

The risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers is higher in people who use both tobacco and alcohol than it is in people who use only tobacco or only alcohol. The risk of oral cavity cancer and oropharyngeal cancer is about 5 to 14 times higher in people who both smoke and drink heavily than it is in people who never smoke cigarettes or consume alcohol.

#### Betel quid chewing

Chewing betel quid alone or with added tobacco has been shown to increase the risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers. Betel quid contains areca nut, which is a cancer-causing substance. The risk of these cancers increases with how long and how often betel quid is chewed. The risk is higher when chewing betel quid with tobacco than when chewing betel quid alone. Betel quid chewing is common in many countries in South Asia and Southeast Asia, including China and India.

#### Personal history of head and neck cancer

A personal history of head and neck cancer increases the risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers.

### The following is a risk factor for oral cavity cancer and oropharyngeal cancer:

#### Human papillomavirus (HPV) infection

Being infected with certain types of human papillomavirus (HPV), especially HPV-16, increases the risk of oropharyngeal cancers. HPV infection may also increase the risk of some oral cavity cancers. HPV infection is spread mainly through sexual contact.

The risk of oropharyngeal cancer is about 15 times higher in people who have oral HPV-16 infection compared with people who do not have oral HPV-16 infection.

### The following is a protective factor for oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers:

#### Quitting smoking

Studies have shown that when people stop smoking cigarettes, their risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers decreases by one half (50%) within 5 to 9 years. Within 20 years of quitting, their risk of these cancers is the same as for a person who never smoked cigarettes.

### It is not clear whether avoiding certain risk factors will decrease the risk of oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers.

Some studies show that when people stop drinking alcohol, their risk of oral cavity and laryngeal cancers decreases within about 20 years.

Getting an HPV vaccination greatly lessens the risk of oral HPV infection. It is not yet known whether getting an HPV vaccination at any age will decrease the risk of oropharyngeal cancer from HPV infection. For information about the use of HPV vaccination to prevent cervical cancer, see Cervical Cancer Causes, Risk Factors, and Prevention (https://www.cancer.gov/types/cervical/causes-risk-prevention#_12).

### Cancer prevention clinical trials are used to study ways to prevent cancer.

Cancer prevention clinical trials are used to study ways to lower the risk of certain types of cancer. Some cancer prevention trials are done with healthy people who have not had cancer but who have an increased risk for cancer. Other prevention trials are done with people who have had cancer and are trying to prevent another cancer of the same type or to lower their chance of developing a new type of cancer. Other trials are done with healthy volunteers who are not known to have any risk factors for cancer.

The purpose of some cancer prevention clinical trials is to find out whether actions people take can prevent cancer. These may include eating fruits and vegetables, exercising, quitting smoking, or taking certain medicines, vitamins, minerals, or food supplements.

### New ways to prevent oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about oral cavity, oropharyngeal, hypopharyngeal, and laryngeal cancers prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/patient/oral-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389257]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).